# Cancer Prevention Overview (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## The Burden of Cancer

In 2025, an estimated 2,041,910 people will be diagnosed with cancer in the United States, and an estimated 618,120 people will die of cancer.[1] Cancer incidence and mortality help to define the scope of the burden that cancer imposes on society, but these indicators do not fully characterize the impact that cancer has on cancer patients and their families. In addition to the physical morbidity caused by cancer, cancer is frequently associated with emotional distress and an overall reduction in quality of life.[2] Cancer has also been observed to be a financial stressor. In a population-based study in western Washington, 197,840 cancer patients were matched with an equal number of controls by age, sex, and zip code. Cancer patients were 2.6 times more likely to file for bankruptcy than the cancer-free controls (P < .05).[3]

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Faller H, Schuler M, Richard M, et al.: Effects of psycho-oncologic interventions on emotional distress and quality of life in adult patients with cancer: systematic review and meta-analysis. J Clin Oncol 31 (6): 782-93, 2013.23319686
Ramsey S, Blough D, Kirchhoff A, et al.: Washington State cancer patients found to be at greater risk for bankruptcy than people without a cancer diagnosis. Health Aff (Millwood) 32 (6): 1143-52, 2013.23676531

## Description of the Evidence

Prevention is defined as the reduction of cancer mortality via reduction in the incidence of cancer. This can be accomplished by avoiding a carcinogen or altering its metabolism; pursuing lifestyle or dietary practices that modify cancer-causing factors or genetic predispositions; medical interventions (e.g., chemoprevention) or risk-reducing surgical procedures; or early detection strategies that can result in removal of precancerous lesions, such as colonoscopy for colorectal polyps.

## About the PDQ Cancer Prevention Summaries

The PDQ cancer prevention summaries are primarily organized by specific anatomical cancer site to facilitate consideration of the unique characteristics of specific malignancies. This section provides an overview of cancer prevention strategies, including a summary of evidence for selected strategies used to prevent a broad spectrum of malignancies. The strength of evidence and magnitude of effects of these strategies, however, may vary by cancer site. Other PDQ cancer prevention summaries address the prevention of specific types of cancer and provide more detailed descriptions of the evidence.

There are many common beliefs or speculations about causes of cancer. However, putative causes of cancer for which there is very little scientific evidence, positive or negative, are not considered in these summaries. Therefore, absence of an environmental, dietary, or lifestyle factor from these summaries implies insufficient evidence for detailed consideration and not necessarily absence of effect. Many such factors are deserving of research regarding their potential roles in cancer, but if that research does not exist, has not been published, or the Editorial Board judges the research to be of insufficient quantity or of poor quality, they are not addressed in these summaries.

## Carcinogenesis

Carcinogenesis refers to an underlying etiological pathway that leads to cancer. Several models of carcinogenesis have been proposed. Knudson proposed a “two-hit” model requiring a mutation in both copies of a gene resulting in cancer. Expansion of this concept has resulted in other widely cited models of carcinogenesis including those of Vogelstein and Kinzler [1] and Hanahan and Weinberg.[2] The model of Vogelstein and Kinzler emphasizes that cancer is ultimately a disease of damaged DNA, comprised of a series of genetic mutations that can transform normal cells to cancerous cells. The genetic mutations include inactivation of tumor suppressor genes and activation of oncogenes. Compared with cancers arising in the general population, individuals with a major inherited predisposition to cancer are born with inherited (i.e., germline) mutations in genes involved in cancer causation, giving them a head start on the pathway to cancer. Similar mutations would be expected to result in cancer progression among all individuals; however, in those without a major inherited cancer predisposition, the mutation would occur as a somatic mutation later during their lifetime.

The model of Hanahan and Weinberg focuses on the hallmark events at the cellular level that lead to a malignant tumor. In this model, the hallmarks of cancer include sustained angiogenesis, limitless replicative potential, evading apoptosis, self-sufficiency in growth signals, and insensitivity to antigrowth signals, leading to the defining characteristics of malignant tumors, which give them the ability to invade and metastasize. This model highlights the fact that malignant tumors arise and flourish within the environment of a whole organism. The tissue organizational field theory [3] posits that carcinogenesis is better conceptualized at the level of tissues rather than cells. This theory is based on the dual premise that carcinogenesis is driven by defects in tissue organization and that all cells are inherently in a proliferative state.

Models of carcinogenesis such as these are purposefully simplistic but, nevertheless, illustrate that carcinogenesis requires a constellation of steps that often take place for decades.

The complexity of carcinogenesis is magnified when one considers that the specific details of the carcinogenic pathway described by these models would be expected to have unique characteristics for each anatomical site. Under these circumstances, the risk factors and clinical characteristics of malignancies exhibit considerable variation by anatomic site and by different tumor types within the same anatomical site. For these reasons, human cancer is really not a single disease but a family of different diseases.

### References

Vogelstein B, Kinzler KW: Cancer genes and the pathways they control. Nat Med 10 (8): 789-99, 2004.15286780
Hanahan D, Weinberg RA: The hallmarks of cancer. Cell 100 (1): 57-70, 2000.10647931
Sonnenschein C, Soto AM: Theories of carcinogenesis: an emerging perspective. Semin Cancer Biol 18 (5): 372-7, 2008.18472276

## Risk Factors

The promise of cancer prevention is derived from observational epidemiological studies that show associations between modifiable lifestyle factors or environmental exposures and specific cancers. The expectation is that, if a risk factor truly causes cancer, it would also be the case that a lifestyle modification (i.e., changing one's risk profile from bad to good) would actually reduce cancer risk, at least partially. This expectation can be fulfilled only if the association is due to a causal (and ideally, reversible) relationship. Because observational studies rarely provide conclusive evidence of such relationships, additional evidence is required.[1] For a few exposures, randomized controlled trials (RCTs) have tested whether interventions suggested by epidemiological studies and leads based on laboratory research result in reduced cancer incidence and mortality.

### Risk Factors Causally Associated With Cancer

#### Cigarette smoking/tobacco use

Decades of research have consistently established the strong association between tobacco use and cancers of many sites. Specifically, cigarette smoking has been established as a cause of a range of cancers, including lung, oral cavity, esophageal, bladder, kidney, pancreatic, stomach, and cervical cancers, and acute myelogenous leukemia. The body of epidemiological evidence confirming these associations is substantial. Further support is demonstrated by the lung cancer death rates in the United States, which have mirrored smoking patterns, with increases in smoking followed by dramatic increases in lung cancer death rates and, more recently, decreases in smoking followed by decreases in lung cancer death rates in men. As a single exposure that is relatively easy to measure accurately, this extensive body of evidence has led to the estimation that cigarette smoking causes 30% of all cancer deaths in the United States. Smoking avoidance and smoking cessation result in decreased incidence and mortality from cancer.[2] For more information, see Lung Cancer Prevention; Lung Cancer Screening; and Cigarette Smoking: Health Risks and How to Quit.

#### Infections

Globally, infectious agents have been estimated to cause about 13% of all cancer cases.[3] Infection with an oncogenic strain of human papillomavirus (HPV) is considered a necessary event for subsequent cervical cancer, and vaccine-conferred immunity results in a marked decrease in precancerous lesions. Oncogenic strains of HPV are also linked with cancers of the penis, vagina, anus, and oropharynx. Other examples of infectious agents that cause cancer are hepatitis B and hepatitis C viruses (liver cancer), Epstein-Barr virus (Burkitt lymphoma), and Helicobacter pylori (gastric cancer).[3] If an infectious agent is truly a cause of cancer, then efficacious, anti-infective interventions would be expected in most instances to be effective cancer-prevention interventions as has been shown in the case of HPV vaccination for the prevention of invasive cervical cancers.[4] For more information, see the following PDQ summaries:

- Cervical Cancer Prevention
- Cervical Cancer Screening
- Liver (Hepatocellular) Cancer Prevention
- Liver (Hepatocellular) Cancer Screening
- Stomach (Gastric) Cancer Prevention
- Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention

#### Radiation

Radiation is energy in the form of high-speed particles or electromagnetic waves. Exposure to radiation, primarily UV radiation and ionizing radiation, is a clearly established cause of cancer. Exposure to solar UV radiation is the major cause of nonmelanoma skin cancers, which are by far the most common malignancies in human populations.[5]

Ionizing radiation is radiation with enough energy to remove tightly bound electrons from their orbits, causing atoms to become charged or ionized. Ions formed in the molecules of living cells can go on to react with and potentially damage other molecules in the cell. At low doses (e.g., those associated with background radiation), the cells repair the damage rapidly. At moderate doses, the cells may be changed permanently or die from their inability to repair the damage. Cells changed permanently may go on to produce abnormal cells when they divide, and in some circumstances, these altered cells may become cancerous or lead to other abnormalities (e.g., birth defects). Defects in ability to repair damage caused by ionizing radiation may influence the impact of radiation exposure on cancer risk.

There is extensive epidemiological and biological evidence that links exposure to ionizing radiation with the development of cancer, and in particular, cancer that involves the hematological system, breast, lungs, and thyroid. The National Research Council of the National Academies' Committee to Assess the Health Risks from Exposure to Low Levels of Ionizing Radiation report, the Biologic Effects of Ionizing Radiation VII,[6] the most widely cited source on the topic, concluded after a comprehensive review of the medical literature that no dose of radiation should be considered completely safe, and attempts should be made to keep radiation doses as low as possible. In this report, several lines of evidence were cited documenting the association between ionizing radiation exposure and cancer. The first line of evidence comes from studies of the development of cancer among Japanese atomic-bomb survivors. Even at low doses of radiation, atomic-bomb survivors were at increased risk of developing cancer.[6] The second line of evidence comes from epidemiological studies of medically irradiated populations who were therapeutically irradiated for both malignant and benign diseases. Following high-dose radiation therapy for malignant disease, the risk of secondary malignancy is high. The relatively common use of radiation for benign disease between 1940 and 1960 resulted in a substantially increased relative risk (RR) of developing cancer. An additional line of evidence comes from an increased risk of cancer-specific mortality associated with exposure to medical ionizing radiation, for both the recipients of diagnostic x-rays and x-ray personnel.

The major sources of population exposure to ionizing radiation are medical radiation (including x-rays, computed tomography [CT], fluoroscopy, and nuclear medicine) and naturally occurring radon gas in the basements of homes. Limiting unnecessary CT scans and other diagnostic studies, as well as reducing radiation exposure doses, are important prevention strategies.[7,8] For more information, see the following PDQ summaries:

- Breast Cancer Prevention
- Breast Cancer Screening
- Skin Cancer Prevention
- Lung Cancer Prevention

Exposure to ionizing radiation has increased during the last two decades as a result of the dramatic increase in the use of CT. Exposure to ionizing radiation associated with CT is in the range where carcinogenesis has been demonstrated.[9,10] Repeat exposure to radiation from medical imaging will further increase cancer risk, because risk is proportional to exposure. One study found that half the subjects who were exposed to radiation from medical imaging underwent repeat imaging within 3 years. Overall, 0.2% of the nearly 1 million participants followed for 3 years received doses above 50 mSv.[11]

One approach to estimate the potential contribution of exposure to ionizing radiation from medical imaging is to develop statistical models based on the estimated cancer risks associated with a range of dose levels. For example, one estimate of the CT scans performed in the United States in 2007 predicted that 29,000 (95% uncertainty limits of 15,000–45,000) cancers might result in the future. One-third of the projected cancers were caused by CT scans done on individuals aged 35 to 54 years. This estimate was derived from risk models based on organ-specific radiation doses from national surveys, frequency of CT scans in 2007 by age and sex from survey and insurance claim data, and the National Research Council of the National Academies' report, Biological Effects of Ionizing Radiation.[9]

Data are now emerging from studies large enough to directly estimate the cancer risk associated with diagnostic imaging using ionizing radiation. For example, in a cohort of 10.9 million Australians, electronic medical records were used to document the diagnostic CT scans of youths who received CT scans when they were aged 0 to 19 years. This cohort was then linked to the National Death Index and Australian Cancer Database.[12] Compared with those who did not have a CT scan, those who had at least one CT scan were statistically significantly more likely to be diagnosed with cancer as they were followed into young adulthood (RR, 1.24; 95% confidence interval [CI], 1.20–1.29; average follow-up in those who had a CT was 9.5 years). A statistically significant dose-response relationship was observed, with cancer risk increasing with each additional CT scan. Thus, the findings of cohort studies with directly measured CT scans now substantiate the statistical models and document the real-world cancer risks associated with exposure to ionizing radiation via medical imaging.

Diagnostic imaging in childhood and adolescence is even associated with an elevated risk of a broad range of solid and hematologic malignancies at a young age. In a population-based South Korean cohort of more than 12 million children aged 0 to 19 years, the incidence rate ratio of cancers in the 10.6% of those exposed to diagnostic radiation was 1.64 after a lag period of 2 years since exposure (95% CI, 1.56–1.73; P < .001), compared with those who had no exposure.[13]

#### Immunosuppression after organ transplant

Medications that suppress the immune system in patients undergoing organ transplant are associated with an increased cancer risk.[14] A retrospective population-based cohort study of solid-organ transplant recipients in Ontario, Canada, during a 20-year period demonstrated that solid organ transplant recipients are at increased risk of cancer-specific death, regardless of age, sex, and organ transplanted. The risk is higher during the first 6 months posttransplant but persists for many years. It is especially high for cancers linked to viral infections. As outcomes of transplant have improved, cancer mortality from secondary cancers has increased and is now the second most common cause of death after transplant.[15]

### Risk/Protective Factors With Uncertain Associations With Cancer

#### Diet

Estimates concerning the potential contribution of diet to the population burden of cancer have varied widely.[16] In contrast to the epidemiological evidence on cigarette smoking and cancer, evidence for the influence of dietary factors and cancer is uncertain. An assessment of the potential role of diet entails measuring the net contribution of diets, comprising factors that may protect against cancer and other factors that may increase cancer risk. Measuring an individual’s usual diet and its direct relevance to cancer risk also poses challenges.[17]

Examples in which the type of study design led to substantively different results further illustrate the complexities of the relationship between food and nutrient intake and human cancer risk. Observational epidemiological studies (case-control and cohort studies), which used self-reported dietary assessments that are prone to substantial measurement error, have suggested associations between diet and cancer development, but randomized trials of interventions provided little or no support. For example, based on population-based epidemiological data, high-fiber diets were recommended to prevent colon neoplasms. However, a 2017 Cochrane database systematic review of RCTs of supplemental fiber found a lack of evidence to suggest that increased dietary fiber intake reduces the recurrence of adenomatous polyps in those with a history of adenomatous polyps within a 2- to 8-year period.[18] Likewise, systematic evidence reviews of cohort studies [19,20] and randomized trials [21] found small or uncertain effects of red meat intake or reduction in intake on overall cancer incidence and mortality. The overall quality of evidence was graded as low to very low. Likewise, a systematic evidence review and meta-analysis of prospective cohort studies found no evident association between dietary total protein, animal protein, or plant protein intakes and cancer mortality.[22]

Associations reported from observational epidemiological analysis based on self-reported assessments should be viewed in the context of the limitations described above. On the other hand, stronger evidence of causal relationships is unlikely to be provided by relatively short-term RCTs, especially if lifelong dietary patterns or dietary intake during specific life stages are most important in inducing or preventing cancer.

#### Alcohol

With respect to dietary factors that may increase cancer risk, the strongest evidence in the World Cancer Research Fund and American Institute for Cancer Research (WCRF/AICR) report was for drinking alcohol. The evidence was judged to be “convincing” that drinking alcohol increased the risk of cancers of the mouth, esophagus, breast, and colorectum (the latter in men). Further, the evidence was judged to be “probable” that drinking alcohol increased the risk of liver cancer and colorectal cancer (the latter in women).

In relation to human cancer, diets reflect the sum total of a complex mixture of exposures, as demonstrated by the examples of fruit/vegetable intake and alcohol consumption. No dietary factors appear to be uniformly relevant to all forms of cancer. For more information, see the following PDQ summaries:

- Breast Cancer Prevention
- Colorectal Cancer Prevention
- Lung Cancer Prevention
- Esophageal Cancer Prevention
- Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention
- Liver (Hepatocellular) Cancer Prevention

#### Physical activity

A growing body of epidemiological evidence suggests that people who are more physically active have a lower risk of certain malignancies than those who are more sedentary. The evidence was judged to be “probable” that physical activity was associated with lower risk of postmenopausal breast cancer and endometrial cancer. As with the dietary factors described above, physical activity seems to play a more prominent role in selected malignancies. The inverse associations observed for selected malignancies make this a promising area for cancer prevention research, particularly because causal associations have not been established. The excess risk of many cancers seen with obesity, in combination with evidence to suggest that physical activity is inversely associated with at least a few cancers, raises the hypothesis that energy balance may influence cancer risk. For more information, see Breast Cancer Prevention; Colorectal Cancer Prevention; and Endometrial Cancer Prevention.

#### Obesity

Obesity is being increasingly recognized as an important cancer risk factor. The WCRF/AICR report concluded that obesity is convincingly linked to postmenopausal breast cancer and cancers of the esophagus, pancreas, colorectum, endometrium, and kidney. Furthermore, the WCRF/AICR report judged body fatness to be a probable risk factor for cancer of the gallbladder and the evidence to be “limited suggestive” for liver cancer. These conclusions from the WCRF/AICR evidence review were corroborated in a cohort study based on medical records data from 5.24 million adults in the United Kingdom.[23] The results of this U.K. cohort study also bolstered the evidence for an association between body mass index (BMI) and gallbladder cancer (RR, 1.3; 95% CI, 1.1–1.5 per 5 kg/m^2^ increase in BMI) and liver cancer (RR, 1.19; 95% CI, 1.12–1.27 per 5 kg/m^2^ increase in BMI).[23] A prospective study of nationally representative cohorts that examined obesity in relation to cancer mortality emphasized that factors associated with cancer do not uniformly apply to all human malignancies. The study results revealed that obesity was associated with an increased risk of dying of obesity-associated malignancies, but obesity was not associated with overall cancer mortality.[24] If the associations between obesity and the cancers mentioned above are causal, which has yet to be established, the current increase in the prevalence of obesity in the United States and elsewhere poses a severe challenge to cancer prevention efforts. The magnitude of the impact of obesity on public health and the population burden of cancer is likely to be substantial but is expected to be less than that of cigarette smoking. Smoking has a high prevalence and is causally associated with 13 types of cancer, and the magnitude of the associations are often much stronger than those observed for obesity. Furthermore, weight loss has yet to be shown to reduce the risk of obesity-associated malignancies.[25] For more information, see the following PDQ summaries:

- Breast Cancer Prevention
- Colorectal Cancer Prevention
- Endometrial Cancer Prevention
- Lung Cancer Prevention

A recent analysis [1] of the long-running Nurses' Health Study and Health Professionals Follow-up Study estimated the proportions of cancer cases and deaths in the U.S. population based on adoption of a low-risk lifestyle. A low-risk lifestyle is characterized by being a never-smoker or former smoker, drinking alcohol moderately or not at all, having a BMI between 18.5 and 27.5, and meeting the 2008 Physical Activity Guidelines for Americans. One major weakness of the study was that its premise assumed the causality of the nonsmoking risk factors. The analysis was further weakened by using self-reported measures of diet and alcohol use and by measuring only leisure-time (rather than all) physical activity. Also, the authors did not present the effects of the nonsmoking risk factors after accounting for smoking. This analysis and others with similar weaknesses should therefore be interpreted cautiously.

Recent efforts to refine associations between obesity and cancer risk center around the hypothesis that visceral adipose tissue (surrounding internal organs) may be driving the associations that have been observed with BMI (which is technically a measure of body size, not adiposity per se).[26,27] These efforts explore more comprehensive and targeted measures of adiposity than BMI alone to characterize cancer risk.

#### Diabetes

Observational studies suggest that all-cancer incidence and mortality are slightly increased (10%–15%) in individuals with diabetes, although the increase is greater for certain organ sites and null for others.[28-30] Because there is biological heterogeneity in diabetes and cancer, diabetes and cancer share a number of risk factors, and diabetes almost always requires long-term medication use, it is not possible to know what the observed associations (especially those that are small) actually represent. Furthermore, most observational studies rely on self-reports of diabetes (as “has diabetes” or “does not have diabetes”), making it impossible to explore whether associations differ by diabetic type or severity, degree of diabetic control, and other factors that can be determined only using biospecimens and repeated measures. These limitations must be considered when findings are interpreted.

At least four of the following characteristics of diabetes have been hypothesized to increase cancer risk:

- Hyperinsulinemia (including insulin resistance).
- Hyperglycemia.
- Downregulation of sex hormone–binding globulin.
- Chronic inflammation.

Diabetes and cancer share a number of risk factors, including aging, obesity, smoking, unhealthy diet, and physical inactivity.[2] Diabetes treatments include exogenous insulin injections, as well as oral medications that modify insulin secretion and sensitivity, reduce blood glucose levels, or prevent the kidneys from reabsorbing blood glucose.[31]

In prospective observational studies, risk of, and death due to, cancers of the liver, pancreas, colon/colorectum, and female breast are consistently higher in individuals with diabetes. Increases in risk or death also have been observed for cancers of the endometrium, ovary, bladder, and oral cavity/pharynx. A prospective cohort study that included long-term follow-up of more than a million U.S. adults evaluated diabetes as a predictor of cancer mortality.[29] The analyses controlled for age, education, BMI, smoking, alcohol intake, vegetable intake, red meat intake, physical activity, and aspirin use. The study found the greatest increase in mortality for the aforementioned cancer sites was for liver cancer in males (RR, 2.26; 95% CI, 1.89–2.70); the smallest increase in mortality was for breast cancer in females (RR, 1.16; 95% CI, 1.03–1.29). Except for death due to male breast cancer (analysis included 12 patients with diabetes who were dying of the cancer), the remainder of positive statistically significant RRs were no greater than 1.5. A pooled data analysis of 97 prospective studies (almost 821,000 individuals) that controlled for age, smoking status, and BMI presented non–sex-stratified hazard ratios (HRs).[28] The analysis reported findings similar to those in the aforementioned study. However, contrary to that study, it found increases in risk of death caused by lung cancer (HR, 1.27; 95% CI, 1.13–1.43) and ovarian cancer (HR, 1.45; 95% CI, 1.03–2.02). An umbrella review of meta-analyses [30] of type 2 diabetes and cancer reported a statistically significant 10% increase in risk of all-cancer incidence, a statistically significant 16% increase in all-cancer mortality, and statistically significant increases in the incidence of 12 cancers. Relative increases in the incidence of pancreas, endometrium, and liver cancer were roughly twofold and statistically significant.

Metformin use has been associated with a decrease in breast cancer incidence and mortality in observational studies and is currently under study in clinical trials. Metformin has been hypothesized to reduce risk by inhibiting tumor cell growth and proliferation through adenosine monophosphate (AMP)–kinase activation. The use of medications that affect incretin receptor signaling has been postulated to increase pancreatic cancer incidence, but neither animal nor clinical data (which are limited) support this claim at this time.[32] Long-term use of exogenous, long-acting insulin has never consistently been shown to increase cancer risk.

### The Impact of Screen Detection on Measures of Risk

Many of the groundbreaking observational studies in cancer etiology date back to a time when widespread cancer screening did not occur. Given the extensive uptake of screening for certain cancers over the past quarter-century, recently conducted observational etiological studies included participants whose disease was detected through screening. When overdiagnosis exists with screening, and screening behavior or willingness to seek diagnostic evaluation is correlated with cancer risk factors, relative risk measures generated from today’s etiology studies may not agree with those from studies conducted before the widespread use of screening. This is because overdiagnosed cases would never have been diagnosed in the absence of screening. For example, assume that blue eyes (relative to brown eyes) are associated with receiving prostate-specific antigen screening or preference for diagnostic biopsy, but not with prostate cancer. In the absence of screening, a null result would have been observed for the association of blue eyes and prostate cancer. In the presence of screening, blue eyes would be associated with prostate cancer because blue eyes would lead to screening, and screening would detect overdiagnosed cases.[33]

### References

Song M, Giovannucci E: Preventable Incidence and Mortality of Carcinoma Associated With Lifestyle Factors Among White Adults in the United States. JAMA Oncol 2 (9): 1154-61, 2016.27196525
U.S. Department of Health and Human Services: The Health Consequences of Smoking—50 Years of Progress: A Report of the Surgeon General. U.S. Department of Health and Human Services, CDC, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2014. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK179276/). Last accessed December 30, 2024.
de Martel C, Georges D, Bray F, et al.: Global burden of cancer attributable to infections in 2018: a worldwide incidence analysis. Lancet Glob Health 8 (2): e180-e190, 2020.31862245
Lei J, Ploner A, Elfström KM, et al.: HPV Vaccination and the Risk of Invasive Cervical Cancer. N Engl J Med 383 (14): 1340-1348, 2020.32997908
Scotto J, Fears TR, Fraumeni JF Jr: Solar radiation. In: Schottenfeld D, Fraumeni JF Jr, eds.: Cancer Epidemiology and Prevention. 2nd ed. Oxford University Press, 1996, pp 355-72.
National Research Council (U.S.), Committee to Assess Health Risks from Exposure to Low Levels of Ionizing Radiation: Health Risks From Exposure to Low Levels of Ionizing Radiation: BEIR VII Phase 2. National Academies Press, 2006. Also available online (https://www.nap.edu/catalog/11340/health-risks-from-exposure-to-low-levels-of-ionizing-radiation). Last accessed February 5, 2025.
National Council on Radiation Protection and Measurements: Ionizing Radiation Exposure of the Population of the United States. National Council on Radiation Protection and Measurements, 2009. Also available online (https://pubs.rsna.org/doi/full/10.1148/radiol.2532090494). Last accessed February 5, 2025.
Mettler FA, Thomadsen BR, Bhargavan M, et al.: Medical radiation exposure in the U.S. in 2006: preliminary results. Health Phys 95 (5): 502-7, 2008.18849682
Berrington de González A, Mahesh M, Kim KP, et al.: Projected cancer risks from computed tomographic scans performed in the United States in 2007. Arch Intern Med 169 (22): 2071-7, 2009.20008689
Smith-Bindman R, Lipson J, Marcus R, et al.: Radiation dose associated with common computed tomography examinations and the associated lifetime attributable risk of cancer. Arch Intern Med 169 (22): 2078-86, 2009.20008690
Fazel R, Krumholz HM, Wang Y, et al.: Exposure to low-dose ionizing radiation from medical imaging procedures. N Engl J Med 361 (9): 849-57, 2009.19710483
Mathews JD, Forsythe AV, Brady Z, et al.: Cancer risk in 680,000 people exposed to computed tomography scans in childhood or adolescence: data linkage study of 11 million Australians. BMJ 346: f2360, 2013.23694687
Hong JY, Han K, Jung JH, et al.: Association of Exposure to Diagnostic Low-Dose Ionizing Radiation With Risk of Cancer Among Youths in South Korea. JAMA Netw Open 2 (9): e1910584, 2019.31483470
Engels EA, Pfeiffer RM, Fraumeni JF, et al.: Spectrum of cancer risk among US solid organ transplant recipients. JAMA 306 (17): 1891-901, 2011.22045767
Acuna SA, Fernandes KA, Daly C, et al.: Cancer Mortality Among Recipients of Solid-Organ Transplantation in Ontario, Canada. JAMA Oncol 2 (4): 463-9, 2016.26746479
Schoenfeld JD, Ioannidis JP: Is everything we eat associated with cancer? A systematic cookbook review. Am J Clin Nutr 97 (1): 127-34, 2013.23193004
Freedman LS, Schatzkin A, Midthune D, et al.: Dealing with dietary measurement error in nutritional cohort studies. J Natl Cancer Inst 103 (14): 1086-92, 2011.21653922
Yao Y, Suo T, Andersson R, et al.: Dietary fibre for the prevention of recurrent colorectal adenomas and carcinomas. Cochrane Database Syst Rev 1: CD003430, 2017.28064440
Han MA, Zeraatkar D, Guyatt GH, et al.: Reduction of Red and Processed Meat Intake and Cancer Mortality and Incidence: A Systematic Review and Meta-analysis of Cohort Studies. Ann Intern Med 171 (10): 711-720, 2019.31569214
Vernooij RWM, Zeraatkar D, Han MA, et al.: Patterns of Red and Processed Meat Consumption and Risk for Cardiometabolic and Cancer Outcomes: A Systematic Review and Meta-analysis of Cohort Studies. Ann Intern Med 171 (10): 732-741, 2019.31569217
Zeraatkar D, Johnston BC, Bartoszko J, et al.: Effect of Lower Versus Higher Red Meat Intake on Cardiometabolic and Cancer Outcomes: A Systematic Review of Randomized Trials. Ann Intern Med 171 (10): 721-731, 2019.31569236
Naghshi S, Sadeghi O, Willett WC, et al.: Dietary intake of total, animal, and plant proteins and risk of all cause, cardiovascular, and cancer mortality: systematic review and dose-response meta-analysis of prospective cohort studies. BMJ 370: m2412, 2020.32699048
Bhaskaran K, Douglas I, Forbes H, et al.: Body-mass index and risk of 22 specific cancers: a population-based cohort study of 5·24 million UK adults. Lancet 384 (9945): 755-65, 2014.25129328
Flegal KM, Graubard BI, Williamson DF, et al.: Cause-specific excess deaths associated with underweight, overweight, and obesity. JAMA 298 (17): 2028-37, 2007.17986696
Wolin KY, Colditz GA: Can weight loss prevent cancer? Br J Cancer 99 (7): 995-9, 2008.18728645
Lu Y, Zhao YC, Liu K, et al.: A validated estimate of visceral adipose tissue volume in relation to cancer risk. J Natl Cancer Inst 116 (12): 1942-1951, 2024.39150790
Parra-Soto S, Boonpor J, Lynskey N, et al.: Association between visceral adiposity index and cancer risk in the UK Biobank cohort. Cancer 131 (1): e35576, 2025.39361532
Seshasai SR, Kaptoge S, Thompson A, et al.: Diabetes mellitus, fasting glucose, and risk of cause-specific death. N Engl J Med 364 (9): 829-41, 2011.21366474
Coughlin SS, Calle EE, Teras LR, et al.: Diabetes mellitus as a predictor of cancer mortality in a large cohort of US adults. Am J Epidemiol 159 (12): 1160-7, 2004.15191933
Tsilidis KK, Kasimis JC, Lopez DS, et al.: Type 2 diabetes and cancer: umbrella review of meta-analyses of observational studies. BMJ 350: g7607, 2015.25555821
Type 2 Diabetes. Scottsdale, AZ: Mayo Clinic, 1998. Available online (http://www.mayoclinic.org/diseases-conditions/type-2-diabetes/basics/treatment/con-20031902). Last accessed February 5, 2025.
Egan AG, Blind E, Dunder K, et al.: Pancreatic safety of incretin-based drugs--FDA and EMA assessment. N Engl J Med 370 (9): 794-7, 2014.24571751
Tangen CM, Goodman PJ, Till C, et al.: Biases in Recommendations for and Acceptance of Prostate Biopsy Significantly Affect Assessment of Prostate Cancer Risk Factors: Results From Two Large Randomized Clinical Trials. J Clin Oncol 34 (36): 4338-4344, 2016.27998216

## Interventions With Possible Benefits

### Chemoprevention

Chemoprevention refers to the use of natural or synthetic compounds to interfere with early stages of carcinogenesis, before invasive cancer appears.[1] Several agents have proven benefit.

Selective estrogen receptor modulators (tamoxifen and raloxifene), taken daily for up to 5 years, reduce breast cancer incidence by 50% in high-risk women.[1] Widespread use of these medications for prevention is limited because of side effects (hot flashes, and in the case of tamoxifen, endometrial cancer). For more information, see Breast Cancer Prevention.

Finasteride (an alpha-reductase inhibitor) lowers the incidence of prostate cancer.[2] Finasteride lowers prostate-specific antigen levels, resulting in fewer prostate biopsies, and shrinks normal prostate tissue, which allows easier detection of cancers. Both of these effects may account for the finding that finasteride recipients have an absolute higher incidence of high-grade prostate cancer, i.e., a lower incidence of low-risk cancer (lower overdiagnosis). Long-term follow-up (median, 18 years) after completion of the 7-year treatment intervention in the finasteride randomized trial demonstrated that there was a continued reduction in prostate cancer risk. Concerns regarding the increased number of high-grade tumors have been addressed with the long-term evidence of no increased risk of prostate cancer mortality in men who received finasteride (hazard ratio [HR] for risk of prostate cancer death, finasteride vs. placebo, 0.75; 95% confidence interval [CI], 0.50–1.12).[3] For more information, see Prostate Cancer Prevention.

COX-2 inhibitors inhibit the cyclooxygenase enzymes that are involved in the synthesis of proinflammatory prostaglandins. Evidence suggests that COX-2 inhibitors may prevent colon and breast cancer, but concerns about cardiovascular risk preclude extensive study. A randomized controlled trial of moderately high-dose celecoxib in patients with arthritis showed no difference in cardiovascular outcomes when compared with nonselective nonsteroidal anti-inflammatory agents (NSAIDs).[4] For more information, see Breast Cancer Prevention and Colorectal Cancer Prevention.

### Bariatric Surgery

Bariatric surgery is currently the most effective method for achieving long-term weight loss, and in concert, dramatically improving or preventing diabetes mellitus and hypertension, even in those with previous severe obesity.[5,6] An observational study assessed the relationship between contemporary bariatric procedures (i.e., Roux-en-Y gastric bypass or sleeve gastrectomy), and the incidence and mortality of 13 obesity-associated cancer types as assigned by the International Research on Cancer Handbook Working Group.[7] This study made use of analyzed data from the Surgical Procedures and Long-term Effectiveness in Neoplastic Disease Incidence and Death (SPLENDID) study, which was a retrospective, observational, matched cohort study in patients with obesity who underwent bariatric surgery or received usual care (no bariatric surgery) at the Cleveland Clinic Health System (CCHS).[7] The median follow-up time was 6.1 years. This study found that bariatric surgery was associated with reductions in the 13 obesity-related cancers. However, when each of these cancers was examined individually, the association only remained for endometrial cancer.[7] Cancer-related mortality occurred with an incidence rate of 0.6 events per 1,000 person-years in the bariatric-surgery group compared with 1.2 events per 1,000 person-years in the usual-care group. The cumulative incidence of cancer-related mortality at 10 years was 0.8% (95% CI, 0.4%–1.2%) in the bariatric-surgery group and 1.4% (95% CI, 1.1%–1.6%) in the nonsurgical control group (absolute risk difference, 0.6% [95% CI, 0.1%–1.0%]; adjusted HR, 0.52 [95% CI, 0.31–0.88]; P = .01). There were limitations to this study, which included selection bias and different rates of cancer screening behaviors between the study arms, stemming from the observational nature of the study. Also, there was a low number of incident cancers and a limited follow-up time.

### References

William WN, Heymach JV, Kim ES, et al.: Molecular targets for cancer chemoprevention. Nat Rev Drug Discov 8 (3): 213-25, 2009.19247304
Andriole GL, Bostwick DG, Brawley OW, et al.: Effect of dutasteride on the risk of prostate cancer. N Engl J Med 362 (13): 1192-202, 2010.20357281
Goodman PJ, Tangen CM, Darke AK, et al.: Long-Term Effects of Finasteride on Prostate Cancer Mortality. N Engl J Med 380 (4): 393-394, 2019.30673548
Nissen SE, Yeomans ND, Solomon DH, et al.: Cardiovascular Safety of Celecoxib, Naproxen, or Ibuprofen for Arthritis. N Engl J Med 375 (26): 2519-29, 2016.27959716
Buchwald H, Avidor Y, Braunwald E, et al.: Bariatric surgery: a systematic review and meta-analysis. JAMA 292 (14): 1724-37, 2004.15479938
Schauer DP: Impact of Bariatric Surgery on Life Expectancy in Severely Obese Patients With Diabetes. Ann Surg 266 (6): e57-e58, 2017.29136969
Aminian A, Wilson R, Al-Kurd A, et al.: Association of Bariatric Surgery With Cancer Risk and Mortality in Adults With Obesity. JAMA 327 (24): 2423-2433, 2022.35657620

## Interventions With No Proven Benefit

### Aspirin

Aspirin has been studied extensively as a chemopreventive agent. However, the evidence of benefit for the prevention of cancer or cancer deaths in the general population is mixed, but generally negative. A secondary analysis of pooled data from seven placebo-controlled randomized controlled trials (RCTs) with primary end points of vascular events showed that daily aspirin for at least 4 years reduced overall cancer deaths by 18% (odds ratio, 0.82; 95% confidence [CI], 0.70–0.95).[1] The effect of aspirin on cancer incidence seems to be limited to colorectal cancer in this analysis. A more recent meta-analysis of 16 RCTs, with a mean follow-up of 5.48 years (range, 2–10.7 years) that compared aspirin (doses varying from 81–1,200 mg daily) with placebo controls did not reveal favorable effects of aspirin on cancer mortality (relative risk [RR], 0.99; 95% CI, 0.87–1.12), all-cause mortality (RR, 0.97; 95% CI, 0.92–1.02), or cancer incidence (RR, 0.98; 95% CI, 0.92–1.04).[2]

Cancer incidence was a prospective secondary, albeit underpowered end point in the aspirin components of a 2 × 2 factorial placebo-controlled trial of a polypill (containing simvastatin, atenolol, hydrochlorothiazide, and ramipril) and aspirin (75 mg/day).[3] A total of 5,713 participants with a mean age of 63.9 years underwent randomization after a 3- to 4-week active run-in period and were followed for up to 6 years (mean, 4.6 years). About 48% of the participants were from India, and about 29% of the participants were from the Philippines. About 82% and 81% of participants were adherent to the aspirin and placebo components of the trial, respectively, at 24 months. At 48 months, adherence was 73% and 71%, respectively. Cancer incidence was 1.3% for participants receiving aspirin versus 1.6% for those receiving placebo (hazard ratio [HR], 0.83; 95% CI, 0.54–1.27). Cancer incidence was 1.3% for participants receiving aspirin plus polypill versus 1.7% for those receiving double placebo (HR, 0.78; 95% CI, 0.43–1.42). Likewise, a secondary analysis of cancer outcomes in a placebo-controlled RCT of aspirin/omega-3 fatty acid chemoprevention for cardiovascular disease in patients with diabetes mellitus found no evidence of reduced gastrointestinal cancer risk caused by aspirin use, although the authors noted that the power to detect differences in cancer rates was low.[4] Only one randomized trial of aspirin for primary prevention focused on older individuals without a specific indication to take aspirin, and it suggested that aspirin use may have an adverse effect on cancer outcomes in the elderly. The Aspirin in Reducing Events in the Elderly (ASPREE) trial included study participants aged 70 years and older (≥65 years for Black and Hispanic individuals in the United States) who did not have cardiovascular disease, dementia, or disability. In contrast to other randomized trials of aspirin, an increase in all-cause mortality (HR, 1.14; 95% CI, 1.01–1.29) and risk of cancer death (HR, 1.31; 95% CI, 1.10–1.56) were observed in the aspirin group. An accompanying editorial highlighted that the follow-up time was slightly shorter than in other similar trials and that results with continued follow-up will be informative. Additional characteristics of the trial included a study population that appeared to be healthier than the general population, and mortality rates that were lower in the study group compared with the general population of similar age, sex, and race and ethnicity distribution. At year 5 of the trial, no evidence of a net benefit had been shown in this healthy population with no underlying reason or medical indications for aspirin use.[5,6] Of note, aspirin use was associated with a trend toward an increased risk of metastatic cancers (6.1 vs. 5.1 per 1,000 person-years; HR, 1.19; 95% CI, 1.00–1.43), which tended to be metastatic at diagnosis. Post hoc analysis showed that aspirin use was also associated with a higher risk of death with cancers that presented at stage III (HR, 2.11; 95% CI, 1.03–4.33) or stage IV (HR, 1.31; 95% CI, 1.04–1.64), suggesting that aspirin use may accelerate cancer progression in the elderly.[7] A significant side effect of aspirin use is bleeding, which may preclude widespread use for cancer prevention. Evidence of harm from bleeding, including major bleeding, is more consistent than the evidence of benefit summarized above.

Because aspirin may help reduce death from cardiovascular disease (which is responsible for more deaths than cancer), use of aspirin should be considered in a larger context of prevention beyond cancer. Similarly, serious harms from bleeding (from the gastrointestinal tract or intracranially) should be considered in light of patients' individual risks of specific harms. For more information, see Colorectal Cancer Prevention.

### Vitamin and Dietary Supplement Use

Some have advocated vitamin and mineral supplements for cancer prevention. Many different mechanistic pathways for anticancer effects have been invoked. A commonly tested hypothesis is that antioxidant vitamins may protect against cancer, based on the premise that oxidative damage to DNA leads to cancer progression. Hence preventing oxidative DNA damage would prevent progression to cancer. However, the evidence is insufficient to support the use of multivitamin and mineral supplements or single vitamins or minerals to prevent cancer.[8] Beta carotene is an antioxidant that was thought to prevent or reverse smoking-related changes leading to lung cancer, based on the results of several observational epidemiological studies examining either dietary intake of beta carotene from food sources or blood levels as a marker of dietary intake.[9] However, two prospective, placebo-controlled trials found that smokers and former smokers who received beta carotene supplements had increased lung cancer incidence and mortality.[10]

Other unanticipated adverse events have been documented for dietary supplement use. A meta-analysis of 11 randomized, double-blind, placebo-controlled trials of daily doses of calcium greater than or equal to 500 mg/day versus placebo documented that calcium supplements were associated with a significantly elevated risk of myocardial infarction (RR, 1.27; 95% CI, 1.01–1.59).[11] Dietary calcium intake has not been observed to be associated with an increased risk of myocardial infarction.[12] The discrepancy in findings between calcium in the diet versus high-dose supplementation raises questions about the value of dietary supplements compared with dietary intake. The Iowa Women’s Health Study, an observational study that enrolled over 40,000 women aged 55 to 69 years in 1986, examined the association between dietary supplement use and mortality.[13] Statistically significant excess mortality risk was observed with the use of multivitamins, vitamin B6, folic acid, iron, magnesium, zinc, and copper. Only calcium users were associated with a statistically significant reduction in mortality rates compared with nonusers.

Research into the potential anticancer properties of vitamin and mineral supplements is ongoing, and the results continue to reinforce the lack of efficacy of vitamin supplements in preventing cancer. The extended follow-up results of the Selenium and Vitamin E Cancer Prevention Trial (SELECT) found a statistically significant excess risk of prostate cancer associated with vitamin E supplementation (400 IU/day of all rac-α-tocopherol acetate) compared with placebo (HR, 1.17; 99% CI, 1.0004–1.36; P = .008). The absolute increase in risk of prostate cancer with vitamin E use was 1.6 per 1,000 person-years. Selenium did not reduce the risk of prostate cancer (HR, 1.09; 99% CI, 0.93–1.27).[14]

The results of the Physicians’ Health Study (PHS) II demonstrated that supplementation with vitamin E and/or vitamin C had no benefit, compared with placebo, in preventing either prostate cancer incidence or total cancer incidence.[15]

The results of the Women’s Antioxidant Cardiovascular Study indicated that, compared with placebo, supplementation with vitamin C, vitamin E, or beta carotene was not efficacious in reducing total cancer incidence.[16] In this same study, daily supplements containing folic acid, vitamin B6, and vitamin B12 were compared with placebo; this intervention was not efficacious in reducing the overall risk of developing cancer.[17] An exploratory analysis of pooled data from two Norwegian RCTs showed an increase in both cancer incidence and cancer death in patients treated with folic acid and vitamin B12 versus those receiving placebo or vitamin B6 alone.[18] For more information, see the following PDQ summaries:

- Breast Cancer Prevention
- Colorectal Cancer Prevention
- Lung Cancer Prevention
- Prostate Cancer Prevention

Vitamin D has also generated interest as a potential anticancer agent. Sources of vitamin D include cutaneous synthesis upon exposure to sunlight, dietary intake, and supplements. Evidence for the efficacy of vitamin D supplements with or without calcium in preventing cancer incidence is available as a secondary end point from RCTs, with a summary of the results from three trials providing evidence of lack of efficacy.[19] A fourth RCT further corroborates this lack of cancer chemopreventive effect.[20] The overall body of experimental evidence from randomized trials in humans indicates that at the doses studied (range, 400–1,100 IU daily), vitamin D supplements do not reduce or increase the overall risk of cancer.[21,22] Also, there is no high-level evidence that testing a general (Western) population for vitamin D blood levels and the use of supplements in those found to have low vitamin D levels affects cancer incidence.[23] The VITamin D and OmegA-3 TriaL (VITAL), a placebo-controlled trial of two forms of supplementation (2,000 IU/day of vitamin D and 1g/day of omega-3 fatty acids), found that neither type of supplementation resulted in lower incidence of invasive cancer. Because invasive cancer incidence was one of the primary end points of VITAL (with major cardiovascular events as the coprimary end point), the null results of VITAL provided additional evidence that even large doses of supplemental vitamin D have no discernible impact on cancer incidence.[22,24-26] Despite the negative coprimary end point of cancer incidence, a post hoc analysis of the study showed a possible reduction in advanced-stage (metastatic or fatal) cancers associated with vitamin D supplementation versus placebo (1.7% versus 2.1%; HR, 0.83; 95% CI, 0.69–0.99). However, the association was limited to the 31% of participants with a normal BMI (BMI <25 kg/m^2^), and the analysis was prone to multiplicity and chance post hoc observations.[27] Moreover, there was no apparent effect in the minority of participants who had a low-baseline serum vitamin D level (<20 ng/mL). The VITAL primary end point findings concerning omega-3 fatty acids agree with those from a secondary analysis of cancer outcomes in a placebo-controlled RCT of aspirin/omega-3 fatty acid chemoprevention for cardiovascular disease in patients with diabetes mellitus.[28]

None of the RCTs mentioned above studied multivitamin supplements as commonly taken by the general U.S. population; however, a separate arm of the PHS II directly studied this question. In the PHS II, 14,641 male physicians were randomly assigned to receive either a daily multivitamin supplement or a placebo for a median of 11 years.[29] Multivitamin supplements were associated with an 8% relative decrease in cancer incidence (HR, 0.92; 95% CI, 0.86–0.998; P = .04). The overall reduction in cancer risk was more pronounced in men who had been diagnosed with cancer before the study began (HR, 0.66; 95% CI, 0.50–0.88) than in those with no history of cancer (HR, 0.95; 95% CI, 0.87–1.03), suggesting that the small benefit of multivitamins in reducing overall cancer incidence largely stemmed from the prevention of second primary cancers. This puzzling result, along with the weak association and multiple statistical comparisons made for many different trial end points, diminishes the strength of evidence provided by the PHS II trial. Of note, no significant association between multivitamin use and total mortality was observed in the PHS II (HR, 0.94; 95% CI, 0.88–1.02; P = .13), suggesting neither a negative nor positive effect on life span.[30] This finding differs from the association between supplements and higher mortality reported in the observational Iowa Women’s Health Study.[13]

### References

Rothwell PM, Fowkes FG, Belch JF, et al.: Effect of daily aspirin on long-term risk of death due to cancer: analysis of individual patient data from randomised trials. Lancet 377 (9759): 31-41, 2011.21144578
Haykal T, Barbarawi M, Zayed Y, et al.: Safety and efficacy of aspirin for primary prevention of cancer: a meta-analysis of randomized controlled trials. J Cancer Res Clin Oncol 145 (7): 1795-1809, 2019.31098750
Yusuf S, Joseph P, Dans A, et al.: Polypill with or without Aspirin in Persons without Cardiovascular Disease. N Engl J Med 384 (3): 216-228, 2021.33186492
Bowman L, Mafham M, Wallendszus K, et al.: Effects of Aspirin for Primary Prevention in Persons with Diabetes Mellitus. N Engl J Med 379 (16): 1529-1539, 2018.30146931
McNeil JJ, Nelson MR, Woods RL, et al.: Effect of Aspirin on All-Cause Mortality in the Healthy Elderly. N Engl J Med 379 (16): 1519-1528, 2018.30221595
McNeil JJ, Wolfe R, Woods RL, et al.: Effect of Aspirin on Cardiovascular Events and Bleeding in the Healthy Elderly. N Engl J Med 379 (16): 1509-1518, 2018.30221597
McNeil JJ, Gibbs P, Orchard SG, et al.: Effect of Aspirin on Cancer Incidence and Mortality in Older Adults. J Natl Cancer Inst 113 (3): 258-265, 2021.32778876
Fortmann SP, Burda BU, Senger CA, et al.: Vitamin and mineral supplements in the primary prevention of cardiovascular disease and cancer: An updated systematic evidence review for the U.S. Preventive Services Task Force. Ann Intern Med 159 (12): 824-34, 2013.24217421
Food, Nutrition, Physical Activity, and the Prevention of Cancer: A Global Perspective. Washington, DC: World Cancer Research Fund/American Institute for Cancer Research, 2007. Also available online (https://www.wcrf.org/diet-and-cancer/). Last accessed February 5, 2025.
Gallicchio L, Boyd K, Matanoski G, et al.: Carotenoids and the risk of developing lung cancer: a systematic review. Am J Clin Nutr 88 (2): 372-83, 2008.18689373
Bolland MJ, Avenell A, Baron JA, et al.: Effect of calcium supplements on risk of myocardial infarction and cardiovascular events: meta-analysis. BMJ 341: c3691, 2010.20671013
Al-Delaimy WK, Rimm E, Willett WC, et al.: A prospective study of calcium intake from diet and supplements and risk of ischemic heart disease among men. Am J Clin Nutr 77 (4): 814-8, 2003.12663277
Mursu J, Robien K, Harnack LJ, et al.: Dietary supplements and mortality rate in older women: the Iowa Women's Health Study. Arch Intern Med 171 (18): 1625-33, 2011.21987192
Klein EA, Thompson IM, Tangen CM, et al.: Vitamin E and the risk of prostate cancer: the Selenium and Vitamin E Cancer Prevention Trial (SELECT). JAMA 306 (14): 1549-56, 2011.21990298
Gaziano JM, Glynn RJ, Christen WG, et al.: Vitamins E and C in the prevention of prostate and total cancer in men: the Physicians' Health Study II randomized controlled trial. JAMA 301 (1): 52-62, 2009.19066368
Lin J, Cook NR, Albert C, et al.: Vitamins C and E and beta carotene supplementation and cancer risk: a randomized controlled trial. J Natl Cancer Inst 101 (1): 14-23, 2009.19116389
Zhang SM, Cook NR, Albert CM, et al.: Effect of combined folic acid, vitamin B6, and vitamin B12 on cancer risk in women: a randomized trial. JAMA 300 (17): 2012-21, 2008.18984888
Ebbing M, Bønaa KH, Nygård O, et al.: Cancer incidence and mortality after treatment with folic acid and vitamin B12. JAMA 302 (19): 2119-26, 2009.19920236
Chung M, Lee J, Terasawa T, et al.: Vitamin D with or without calcium supplementation for prevention of cancer and fractures: an updated meta-analysis for the U.S. Preventive Services Task Force. Ann Intern Med 155 (12): 827-38, 2011.22184690
Avenell A, MacLennan GS, Jenkinson DJ, et al.: Long-term follow-up for mortality and cancer in a randomized placebo-controlled trial of vitamin D(3) and/or calcium (RECORD trial). J Clin Endocrinol Metab 97 (2): 614-22, 2012.22112804
Bjelakovic G, Gluud LL, Nikolova D, et al.: Vitamin D supplementation for prevention of cancer in adults. Cochrane Database Syst Rev 6: CD007469, 2014.24953955
Manson JE, Bassuk SS, Lee IM, et al.: The VITamin D and OmegA-3 TriaL (VITAL): rationale and design of a large randomized controlled trial of vitamin D and marine omega-3 fatty acid supplements for the primary prevention of cancer and cardiovascular disease. Contemp Clin Trials 33 (1): 159-71, 2012.21986389
Kahwati LC, LeBlanc E, Weber RP, et al.: Screening for Vitamin D Deficiency in Adults: Updated Evidence Report and Systematic Review for the US Preventive Services Task Force. JAMA 325 (14): 1443-1463, 2021.33847712
Manson JE, Cook NR, Lee IM, et al.: Vitamin D Supplements and Prevention of Cancer and Cardiovascular Disease. N Engl J Med 380 (1): 33-44, 2019.30415629
Manson JE, Cook NR, Lee IM, et al.: Marine n-3 Fatty Acids and Prevention of Cardiovascular Disease and Cancer. N Engl J Med 380 (1): 23-32, 2019.30415637
Keaney JF, Rosen CJ: VITAL Signs for Dietary Supplementation to Prevent Cancer and Heart Disease. N Engl J Med 380 (1): 91-93, 2019.30415594
Chandler PD, Chen WY, Ajala ON, et al.: Effect of Vitamin D3 Supplements on Development of Advanced Cancer: A Secondary Analysis of the VITAL Randomized Clinical Trial. JAMA Netw Open 3 (11): e2025850, 2020.33206192
Bowman L, Mafham M, Wallendszus K, et al.: Effects of n-3 Fatty Acid Supplements in Diabetes Mellitus. N Engl J Med 379 (16): 1540-1550, 2018.30146932
Gaziano JM, Sesso HD, Christen WG, et al.: Multivitamins in the prevention of cancer in men: the Physicians' Health Study II randomized controlled trial. JAMA 308 (18): 1871-80, 2012.23162860
Sesso HD, Christen WG, Bubes V, et al.: Multivitamins in the prevention of cardiovascular disease in men: the Physicians' Health Study II randomized controlled trial. JAMA 308 (17): 1751-60, 2012.23117775

## Environmental Exposures and Pollutants

The relationship between environmental pollutants and cancer risk has been of long-standing interest to researchers and the public. When estimates of the potential burden of cancer have been calculated for different classes of exposure, the factors described earlier, such as cigarette smoking and infections, have represented much greater proportions of the cancer burden than have environmental pollutants. Nevertheless, some associations between environmental pollutants and cancer have been clearly established. Perhaps because the lungs are most heavily exposed to air pollutants, many of the most firmly established examples of pollutants and cancer relate specifically to lung cancer, including secondhand tobacco smoke, indoor radon, outdoor air pollution, and asbestos for mesothelioma. Another environmental pollutant linked with cancer is highly concentrated inorganic arsenic in drinking water, which is causally associated with cancers of the skin, bladder, and lung. Many other environmental pollutants, such as pesticides, have been assessed for risk with human cancer, but with indeterminate results. There are challenging methodological issues to address in these studies, such as accurately measuring exposures for long periods, which often make it difficult to clearly establish an association between an environmental pollutant and cancer.

## Summary

The list of topics considered above is not exhaustive. Other lifestyle and environmental factors known to affect cancer risk (either beneficially or detrimentally) include certain sexual and reproductive practices, the use of exogenous estrogens, and certain occupational and chemical exposures.

In this summary, factors were selected that appear to impact the risk of several types of cancer and that have been identified as being potentially modifiable. These risk factors include cigarette smoking, which has been conclusively linked with a wide range of malignancies. Avoidance of cigarette smoking has been shown to reduce cancer incidence. Other potential modifiable cancer risk factors include alcohol consumption and obesity, as well as physical activity, which is inversely associated with the risk of certain cancers. More research is needed to determine whether these associations are causal and whether avoiding risk behaviors or increasing protective behaviors would actually reduce cancer incidence.

## Latest Updates to This Summary (02/12/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

The Burden of Cancer

Updated statistics with estimated new cases and deaths for 2025 (cited American Cancer Society as reference 1).

Risk Factors

Added text to state that recent efforts to refine associations between obesity and cancer risk center around the hypothesis that visceral adipose tissue may be driving the associations that have been observed with body mass index (BMI) (cited Lu et al. and Parra-Soto et al. as references 26 and 27, respectively). These efforts explore more comprehensive and targeted measures of adiposity than BMI alone to characterize cancer risk.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Cancer Prevention Overview. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/causes-prevention/hp-prevention-overview-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389451]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).